# Hereditary Diffuse Gastric Cancer (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about hereditary diffuse gastric cancer (HDGC). It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction

Hereditary diffuse gastric cancer (HDGC) is an autosomal dominant hereditary cancer syndrome that increases an individual’s risk to develop diffuse gastric cancer and lobular breast cancer. HDGC is defined by the presence of germline pathogenic variants in the CDH1 gene, which codes for the cell–cell adhesion junction protein, E-cadherin. In patients with CDH1 pathogenic variants, early stage gastric cancer is characterized by intramucosal foci of signet ring cell carcinoma while advanced gastric cancer presents as poorly cohesive diffuse type carcinoma with very few typical signet ring cells.[1] In CDH1 pathogenic variant carriers, lifetime risk of diffuse gastric cancer (to age 80 y) ranges from 37% to 70% in men and 25% to 83% in women.[2-5] The average age of gastric cancer diagnosis can range from 38 to 80 years, with the earliest reported diagnosis occurring at age 14 years.[2-4,6,7] The lifetime risk for lobular breast cancer (to age 80 y) is 39% to 55% in women who carry a CDH1 pathogenic variant. The average age of lobular breast cancer diagnosis ranges from 46 to 50 years.[2,4,8] Recent gastric and lobular breast cancer risk estimates are even lower than these numbers [9] because clinical criteria for genetic testing are becoming less stringent. This phenomenon has also been seen with other hereditary cancer syndromes, like hereditary breast and ovarian cancer and Lynch syndrome.

Pathogenic variants in a second gene, CTNNA1, are found in a small number of families with HDGC. This gene codes for an adhesion junction protein, catenin alpha-1.[10,11] The age of gastric cancer onset in confirmed CTNNA1 pathogenic variant carriers ranges from 22 to 72 years. The first study to provide CTNNA1 penetrance estimates reported up to a 57% lifetime risk of developing gastric cancer in families from European hereditary cancer registries.[12] It is unclear if CTNNA1 pathogenic variants increase breast cancer risk.[13] Given the limited knowledge about the prevalence and penetrance of CTNNA1 pathogenic variants, many commercial testing laboratories do not offer clinical genetic testing for this gene.

### References

van der Post RS, Gullo I, Oliveira C, et al.: Histopathological, Molecular, and Genetic Profile of Hereditary Diffuse Gastric Cancer: Current Knowledge and Challenges for the Future. Adv Exp Med Biol 908: 371-91, 2016.27573781
Pharoah PD, Guilford P, Caldas C, et al.: Incidence of gastric cancer and breast cancer in CDH1 (E-cadherin) mutation carriers from hereditary diffuse gastric cancer families. Gastroenterology 121 (6): 1348-53, 2001.11729114
Roberts ME, Ranola JMO, Marshall ML, et al.: Comparison of CDH1 Penetrance Estimates in Clinically Ascertained Families vs Families Ascertained for Multiple Gastric Cancers. JAMA Oncol 5 (9): 1325-1331, 2019.31246251
Xicola RM, Li S, Rodriguez N, et al.: Clinical features and cancer risk in families with pathogenic CDH1 variants irrespective of clinical criteria. J Med Genet 56 (12): 838-843, 2019.31296550
Hansford S, Kaurah P, Li-Chang H, et al.: Hereditary Diffuse Gastric Cancer Syndrome: CDH1 Mutations and Beyond. JAMA Oncol 1 (1): 23-32, 2015.26182300
Delgado E, León-Ponte M, Villahermosa ML, et al.: Analysis of HIV type 1 protease and reverse transcriptase sequences from Venezuela for drug resistance-associated mutations and subtype classification: a UNAIDS study. AIDS Res Hum Retroviruses 17 (8): 753-8, 2001.11429115
Caldas C, Carneiro F, Lynch HT, et al.: Familial gastric cancer: overview and guidelines for management. J Med Genet 36 (12): 873-80, 1999.10593993
Corso G, Intra M, Trentin C, et al.: CDH1 germline mutations and hereditary lobular breast cancer. Fam Cancer 15 (2): 215-9, 2016.26759166
van der Post RS, Vogelaar IP, Carneiro F, et al.: Hereditary diffuse gastric cancer: updated clinical guidelines with an emphasis on germline CDH1 mutation carriers. J Med Genet 52 (6): 361-74, 2015.25979631
Majewski IJ, Kluijt I, Cats A, et al.: An α-E-catenin (CTNNA1) mutation in hereditary diffuse gastric cancer. J Pathol 229 (4): 621-9, 2013.23208944
Benusiglio PR, Colas C, Guillerm E, et al.: Clinical implications of CTNNA1 germline mutations in asymptomatic carriers. Gastric Cancer 22 (4): 899-903, 2019.30515673
Coudert M, Drouet Y, Delhomelle H, et al.: First estimates of diffuse gastric cancer risks for carriers of CTNNA1 germline pathogenic variants. J Med Genet 59 (12): 1189-1195, 2022.36038258
Clark DF, Michalski ST, Tondon R, et al.: Loss-of-function variants in CTNNA1 detected on multigene panel testing in individuals with gastric or breast cancer. Genet Med 22 (5): 840-846, 2020.32051609

## Genetic Testing Criteria for Hereditary Diffuse Gastric Cancer (HDGC)

The International Gastric Cancer Linkage Consortium's (IGCLC) 2020 HDGC genetic testing guidelines are summarized below.[1] CDH1 genetic testing can be conducted when an individual meets the IGCLC's HDGC genetic testing guidelines and when the following items from the personal history or family history criteria below are met. It is recommended that cancer diagnoses and histologies in the proband and/or family members are validated with appropriate medical records. Furthermore, when two or more different cancer types are involved, at least one must be diffuse gastric cancer with signet ring cell carcinoma or lobular breast cancer. Intestinal-type gastric cancers and non-lobular breast cancers cannot be used to meet HDGC genetic testing criteria (even if the histologies of these tumors have been validated), because these cancers are not associated with HDGC. For more information, see the Genetic Evaluation in Individuals With Personal and/or Family Histories of Gastric Cancer section in Genetics of Gastric Cancer.

When an individual meets HDGC genetic testing criteria but genetic testing does not reveal a CDH1 pathogenic variant, CTNNA1 genetic testing is recommended.

Personal History Criteria

- Diffuse gastric cancer diagnosed at age 49 years or younger.
- Diffuse gastric cancer diagnosed at any age in individuals of Māori descent.
- Diffuse gastric cancer and cleft lip or cleft palate diagnosed in the same individual.
- Diffuse gastric cancer and a first-degree relative (FDR) with cleft lip or cleft palate.
- Diffuse gastric cancer and lobular breast cancer, both diagnosed in the same individual at age 69 years or younger.
- Bilateral lobular breast cancer diagnosed at age 69 years or younger.
- Gastric signet ring cell carcinoma in situ or pagetoid spread of gastric signet ring cells diagnosed at age 49 years or younger.

Family History Criteria ^a^

- 2 or more cases of gastric cancer (with at least 1 diffuse gastric cancer case) occurring in the same family, regardless of age.
- 1 or more cases of diffuse gastric cancer diagnosed at any age, and 1 or more cases of lobular breast cancer diagnosed at age 69 years or younger (these cancers must occur in different family members).
- 2 or more cases of lobular breast cancer diagnosed in family members at age 49 years or younger.

^a^ [Note: Family members must be FDRs or second-degree relatives of each other. The IGCLC recommends that affected family members undergo genetic testing, when possible. Providers may want to consider testing tissue (tumor tissue or healthy tissue) from deceased, affected relatives if a family does not have living individuals with breast or gastric cancers. If none of these options are feasible, providers can consider performing genetic testing in unaffected family members. Diffuse gastric cancer is generally diagnosed at an advanced stage (i.e., stage III or stage IV).][1]

### References

Blair VR, McLeod M, Carneiro F, et al.: Hereditary diffuse gastric cancer: updated clinical practice guidelines. Lancet Oncol 21 (8): e386-e397, 2020.32758476

## Definition and Management of Hereditary Diffuse Gastric Cancer (HDGC)–Like Families

CDH1 germline pathogenic variants are found in 30% to 40% of families with clinically defined HDGC from different ethnic backgrounds.[1,2] The 2020 International Gastric Cancer Linkage Consortium defines families as HDGC-like if the following criteria are met: 1) a CDH1 or CTNNA1 pathogenic variant is not found, 2) there is at least one confirmed case of diffuse gastric cancer in the family, and 3) another gastric cancer or lobular breast cancer is found in first-degree or second-degree relatives.

In HDGC-like families, affected individuals and their FDRs may be considered for yearly endoscopic surveillance for at least 2 years after receiving a negative CDH1 genetic test result.[3] Surveillance begins at age 40 years or 10 years before the earliest case of gastric cancer in the family. HDGC surveillance can begin at, but not before, age 18 years. Surveillance intervals can be prolonged at the discretion of the endoscopist after the individual has participated in annual screening for 2 years. The decision to prolong screening intervals can be based on an individual’s previous endoscopy findings and on his/her family history. Risk-reducing total gastrectomy is not advised when endoscopies are negative in HDGC-like families because the level of gastric cancer risk in these individuals is uncertain.

### References

Lynch HT, Grady W, Suriano G, et al.: Gastric cancer: new genetic developments. J Surg Oncol 90 (3): 114-33; discussion 133, 2005.15895459
Suriano G, Oliveira C, Ferreira P, et al.: Identification of CDH1 germline missense mutations associated with functional inactivation of the E-cadherin protein in young gastric cancer probands. Hum Mol Genet 12 (5): 575-82, 2003.12588804
Blair VR, McLeod M, Carneiro F, et al.: Hereditary diffuse gastric cancer: updated clinical practice guidelines. Lancet Oncol 21 (8): e386-e397, 2020.32758476

## Genetics

Hereditary diffuse gastric cancer (HDGC) was first identified in a large, indigenous Māori kindred from New Zealand. These individuals had a germline pathogenic variant in the CDH1 gene.[1] Since this initial report, many studies have found that HDGC is a rare, autosomal dominant disorder that results in increased diffuse gastric cancer and lobular breast cancer risks.[1-4]

### Molecular Biology

In 1995, the CDH1 (cadherin-1) gene was mapped to chromosome 16q22.1.[5] The CDH1 gene spans a region of approximately 100 kb, with 16 exons and a 65-kb-long intron 2.[5] The intron-exon boundaries are highly conserved. Intron 1 contains a 5′ high-density CpG island that may be implicated in transcriptional regulation during embryogenesis and cancer development.[5] The CDH1 gene encodes the E-cadherin transmembrane glycoprotein, which is expressed in epithelial tissue and is responsible for calcium-dependent cell–cell adhesion.[6] E-cadherin is the first adhesion molecule that is expressed at the 8-cell stage during embryonic development. This protein is essential for the compaction of the morula and subsequent organization of epithelial tissues. The E-cadherin protein is crucial for the establishment and maintenance of tissue architecture and homeostasis.[7 ,8] E-cadherin primarily forms adherens junctions via homophilic binding of the extracellular domain of cadherins that is presented on neighboring cells.[9] These adhesion structures act as tumor suppressors, preventing tumor invasion and metastasis.[6] The cytoplasmic domain of E-cadherin is connected to the actin cytoskeleton through various catenins (alpha, beta, and p120 catenins), providing the cell with structure, while also mediating cellular signaling.[10,11] E-cadherin regulates basic cellular processes like cell proliferation, migration, apoptosis, and invasion.[12] E-cadherin is crucial for maintaining tissue homeostasis, and in effect, E-cadherin loss can lead to pathogenic effects in cells.[13]

In 1998, it was determined that germline, heterozygous pathogenic variants in the CDH1 tumor suppressor gene can cause HDGC.[1] Most CDH1 pathogenic variants generate premature termination codons, resulting in loss of protein function due to nonsense-mediated decay.[14] The clinical significance of CDH1 sequence variants fall along a gradient, ranging from pathogenic to benign. CDH1 gene-specific interpretation guidelines exist to determine sequence variant pathogenicity based on the American College of Medical Genetics and Genomics and the Association for Molecular Pathology's (ACMG/AMP) classification framework.[15,16] According to the CDH1 gene-specific criteria, only missense variants that have been shown to affect splicing are classified as pathogenic or likely pathogenic variants. All other CDH1 missense variants are classified as variants of unknown significance (VUS). A retrospective review of clinical data (from European laboratories) that analyzed 854 CDH1 carriers supported this classification rule.[17] The study found that CDH1 pathogenic/likely pathogenic variants were positively associated with HDGC-related phenotypes. There was no evidence for a positive association between HDGC-related phenotypes and CDH1 missense VUS.

A systematic review of the literature from 1998 to 2021 identified 571 germline CDH1 pathogenic variants, with 387 (67.8%) variants reported in 108 different families.[18] The largest clusters of CDH1 pathogenic variants were identified in Central Europe, North America, Northern Europe, New Zealand (Māori), and South America. However, no studies in the review focused on populations from African and Middle Eastern countries. Only one study was included from an Asian country (Japan). A 2022 study of Chinese patients who met HDGC criteria identified two CDH1 pathogenic variants that were not previously reported.[19]

### Genotype-Phenotype Correlations

CDH1 pathogenic variants demonstrate considerable heterogeneity with the types of cancers and the ages of cancer onset seen in carriers. However, a review of available CDH1 literature from 1985 to 2018 did not definitively establish genotype-phenotype correlations that could help direct patient management. This review found that CDH1 pathogenic variants are evenly distributed throughout the gene without a preferential variant type (i.e., nonsense, missense, etc.) or location.[13] An investigation of 152 families with HDGC analyzed the associations between an individual’s CDH1 germline pathogenic variant status and clinical HDGC phenotype. This study found that variants in the intracellular E-cadherin region of the CDH1 gene seemed to protect individuals from developing cancer at young ages (odds ratio [OR], 0.2; P = .0071). Similarly, variants in the linker regions of the CDH1 gene were protective against breast cancer (OR, 0.35; P = .0493).[20] Another study analyzed the frequency of different CDH1 pathogenic variant subtypes in asymptomatic individuals (n = 289) and individuals diagnosed with gastric cancer (n = 224) from HDGC families.[21] In CDH1 carriers, splicing variants were found in 30.4% of healthy individuals and in 15.2% of patients with gastric cancer (P = .0076). Missense variants were found more often in healthy subjects (22.2%) than in individuals with gastric cancer (18.3%), but this difference did not reach statistical significance. The authors of this study concluded that not all CDH1 germline pathogenic variants conferred the same gastric cancer risk.

Possible CDH1 genotype-phenotype correlations have been observed in families with HDGC and cleft lip or cleft palate. However, it is unclear which CDH1 pathogenic variants lead to cleft lip or cleft palate. In 2006, CDH1 splice site variants were found in two families with HDGC and cleft lip or cleft palate. The splice site variants resulted in complex, aberrant splicing in lymphocytes.[22] However, CDH1 splice site variants were subsequently identified in HDGC families without cleft lip or cleft palate.[13,23] A review article noted that families with a combined phenotype of HDGC and cleft lip or cleft palate had CDH1 variants within extracellular domains. However, CDH1 variants within extracellular domains have also been seen in families with isolated HDGC.[24] A systematic review of 280 CDH1 pathogenic variants showed that variants found in individuals with cleft lip or cleft palate seemed to cluster closely in similar regions of the CDH1 gene. These variants often resided within linker regions between extracellular domains.[25] The differences between pathogenic variants in individuals with HDGC plus cleft lip or cleft palate versus those in individuals with HDGC who did not have cleft lip or cleft palate were not robust enough to reliably predict the phenotype for a given CDH1 variant. However, these differences may help providers more accurately assess cleft lip or cleft palate risk in individuals with specific CDH1 variants.

The term, hereditary lobular breast cancer, was created by the International Gastric Cancer Linkage Consortium to describe individuals with a CDH1 pathogenic variant and personal/family histories of lobular breast cancer, but no known personal/family histories of gastric cancer.[26] Given the lack of data supporting a genotype-phenotype distinction between hereditary lobular breast cancer and HDGC, a study assessed the prevalence of occult gastric cancer in patients with hereditary lobular breast cancer and a CDH1 pathogenic variant.[27] The results indicated that germline CDH1 pathogenic variants were not associated with mutually exclusive hereditary lobular breast cancer or HDGC phenotypes. Furthermore, the rates of occult gastric cancer were the same for patients with hereditary lobular breast cancer and for patients with HDGC. The authors emphasized that patients who had previously been given a hereditary lobular breast cancer diagnosis should undergo gastric cancer surveillance and receive counseling regarding risk-reducing gastrectomy.

Overall, there are insufficient data regarding possible CDH1 genotype-phenotype correlations. These findings are not substantial enough to guide individualized CDH1 cancer risk assessment and management.

### References

Guilford P, Hopkins J, Harraway J, et al.: E-cadherin germline mutations in familial gastric cancer. Nature 392 (6674): 402-5, 1998.9537325
Hansford S, Kaurah P, Li-Chang H, et al.: Hereditary Diffuse Gastric Cancer Syndrome: CDH1 Mutations and Beyond. JAMA Oncol 1 (1): 23-32, 2015.26182300
Brooks-Wilson AR, Kaurah P, Suriano G, et al.: Germline E-cadherin mutations in hereditary diffuse gastric cancer: assessment of 42 new families and review of genetic screening criteria. J Med Genet 41 (7): 508-17, 2004.15235021
Kaurah P, MacMillan A, Boyd N, et al.: Founder and recurrent CDH1 mutations in families with hereditary diffuse gastric cancer. JAMA 297 (21): 2360-72, 2007.17545690
Berx G, Staes K, van Hengel J, et al.: Cloning and characterization of the human invasion suppressor gene E-cadherin (CDH1). Genomics 26 (2): 281-9, 1995.7601454
Yelskaya Z, Bacares R, Salo-Mullen E, et al.: CDH1 Missense Variant c.1679C>G (p.T560R) Completely Disrupts Normal Splicing through Creation of a Novel 5' Splice Site. PLoS One 11 (11): e0165654, 2016.27880784
Paredes J, Figueiredo J, Albergaria A, et al.: Epithelial E- and P-cadherins: role and clinical significance in cancer. Biochim Biophys Acta 1826 (2): 297-311, 2012.22613680
van Roy F, Berx G: The cell-cell adhesion molecule E-cadherin. Cell Mol Life Sci 65 (23): 3756-88, 2008.18726070
Shapiro L, Fannon AM, Kwong PD, et al.: Structural basis of cell-cell adhesion by cadherins. Nature 374 (6520): 327-37, 1995.7885471
Aberle H, Schwartz H, Kemler R: Cadherin-catenin complex: protein interactions and their implications for cadherin function. J Cell Biochem 61 (4): 514-23, 1996.8806074
Okamoto R, Irie K, Yamada A, et al.: Recruitment of E-cadherin associated with alpha- and beta-catenins and p120ctn to the nectin-based cell-cell adhesion sites by the action of 12-O-tetradecanoylphorbol-13-acetate in MDCK cells. Genes Cells 10 (5): 435-45, 2005.15836772
Kim NG, Koh E, Chen X, et al.: E-cadherin mediates contact inhibition of proliferation through Hippo signaling-pathway components. Proc Natl Acad Sci U S A 108 (29): 11930-5, 2011.21730131
Figueiredo J, Melo S, Carneiro P, et al.: Clinical spectrum and pleiotropic nature of CDH1 germline mutations. J Med Genet 56 (4): 199-208, 2019.30661051
Karam R, Carvalho J, Bruno I, et al.: The NMD mRNA surveillance pathway downregulates aberrant E-cadherin transcripts in gastric cancer cells and in CDH1 mutation carriers. Oncogene 27 (30): 4255-60, 2008.18427545
Luo X, Maciaszek JL, Thompson BA, et al.: Optimising clinical care through CDH1-specific germline variant curation: improvement of clinical assertions and updated curation guidelines. J Med Genet 60 (6): 568-575, 2023.36600593
Richards S, Aziz N, Bale S, et al.: Standards and guidelines for the interpretation of sequence variants: a joint consensus recommendation of the American College of Medical Genetics and Genomics and the Association for Molecular Pathology. Genet Med 17 (5): 405-24, 2015.25741868
Garcia-Pelaez J, Barbosa-Matos R, Lobo S, et al.: Genotype-first approach to identify associations between CDH1 germline variants and cancer phenotypes: a multicentre study by the European Reference Network on Genetic Tumour Risk Syndromes. Lancet Oncol 24 (1): 91-106, 2023.36436516
Corso G, Tagliaferri V, Massari G, et al.: CDH1 mutations recurrence and global clustering in genetically tested families with hereditary diffuse gastric cancer syndrome: results from a systematic study. Fam Cancer 22 (2): 187-192, 2023.35882702
Pan Z, Fu Z, Luo C, et al.: CDH1 germline mutations in a Chinese cohort with hereditary diffuse gastric cancer. J Cancer Res Clin Oncol 148 (8): 2145-2151, 2022.34537906
Lo W, Zhu B, Sabesan A, et al.: Associations of CDH1 germline variant location and cancer phenotype in families with hereditary diffuse gastric cancer (HDGC). J Med Genet 56 (6): 370-379, 2019.30745422
Corso G, Magnoni F, Massari G, et al.: CDH1 germline mutations in healthy individuals from families with the hereditary diffuse gastric cancer syndrome. J Med Genet 59 (4): 313-317, 2022.34952833
Frebourg T, Oliveira C, Hochain P, et al.: Cleft lip/palate and CDH1/E-cadherin mutations in families with hereditary diffuse gastric cancer. J Med Genet 43 (2): 138-42, 2006.15831593
Corso G, Marrelli D, Pascale V, et al.: Frequency of CDH1 germline mutations in gastric carcinoma coming from high- and low-risk areas: metanalysis and systematic review of the literature. BMC Cancer 12: 8, 2012.22225527
Obermair F, Rammer M, Burghofer J, et al.: Cleft lip/palate and hereditary diffuse gastric cancer: report of a family harboring a CDH1 c.687 + 1G > A germline mutation and review of the literature. Fam Cancer 18 (2): 253-260, 2019.30306390
Selvanathan A, Nixon CY, Zhu Y, et al.: CDH1 Mutation Distribution and Type Suggests Genetic Differences between the Etiology of Orofacial Clefting and Gastric Cancer. Genes (Basel) 11 (4): , 2020.32260281
Blair VR, McLeod M, Carneiro F, et al.: Hereditary diffuse gastric cancer: updated clinical practice guidelines. Lancet Oncol 21 (8): e386-e397, 2020.32758476
Gamble LA, Rossi A, Fasaye GA, et al.: Association Between Hereditary Lobular Breast Cancer Due to CDH1 Variants and Gastric Cancer Risk. JAMA Surg 157 (1): 18-22, 2022.34643667

## Clinical Manifestations

### Gastric Cancer Risk

In CDH1 pathogenic variant carriers, lifetime risk of diffuse gastric cancer by age 80 years ranges from 37% to 70% in men and 25% to 83% in women.[1-4] The average age of gastric cancer onset ranges from 38 to 80 years, with the earliest cancer reported at age 14 years.[1-3,5 ,6] It is important to recognize that the diffuse gastric cancer in CDH1 pathogenic variant carriers often begins as multifocal, microscopic deposits of signet ring cell carcinoma. Hereditary diffuse gastric cancer (HDGC) arises in the neck region of the gastric glands (rather than on the surface epithelium), where dysplasia from environmental and inflammatory risk factors tends to form. These signet ring cell carcinomas grow diffusely, but subtly, into the adjoining gastric mucosa and submucosa. CDH1-associated diffuse gastric cancer has a similar presentation and clinical course as sporadic diffuse gastric cancer. Minimally invasive therapy is an option for precursor lesions identified on endoscopy, but most enlarging signet ring cell lesions associated with HDGC cannot be detected until they reach an advanced stage. HDGC begins as multifocal signet ring cells that are found throughout the stomach. It is unclear if this also occurs in sporadic diffuse gastric cancer.

Figure 1. High-power image of a gastric biopsy tissue sample showing signet ring cell carcinoma. Note the absence of gland formation, which indicates that this lesion is poorly-differentiated carcinoma. Also note the overlying epithelium, which although effaced by the presence of underlying tumor, is otherwise normal.

High-power image of a gastric biopsy tissue sample showing signet ring cell carcinoma.

Figure 2. Endoscopic image of diffuse gastric cancer with typical linitis plastica involvement. This occurs at an advanced stage. The gastric mucosa and submucosa are diffusely infiltrated such that the entire stomach becomes stiff, losing contractility and the ability to digest food. This leads to the typical symptoms of nausea and vomiting. Biopsy is generally informative, but a very superficial biopsy may be negative for cancer cells. Hence, it is imperative for pathologists to carefully search biopsy specimens for isolated signet ring cells.

Endoscopic image of the inside of the stomach showing diffuse gastric cancer with linitis plastica involvement.

### Breast Cancer Risk

In the general population, most breast cancers are ductal, while about 10% are lobular.[7] In contrast, most breast cancers in women with CDH1 germline pathogenic variants are lobular.[8-10] Penetrance estimates are 39% to 55% for invasive lobular breast cancer (ILC) in women with CDH1 pathogenic variants to age 80 years.[1-3,11] Studies have shown that ILC risk begins to increase before age 30 years, with an average age of onset between 46 and 50 years.[2,4] The histopathological and immunohistochemical features of germline CDH1-related ILC and sporadic ILC are indistinguishable.[9] Overall, ILC tends to be multicentric, and tumors do not form well-defined masses. Instead, ILCs are composed of small, infiltrating epithelial cells, which are dispersed individually in a single-file, linear pattern in a fibrous stroma. ILCs lose expression of the cell–cell adhesion molecule, E-cadherin.[12] ILC is associated with an advanced stage at presentation, and 10% to 15% of cases are bilateral.[12,13] ILC features are often associated with a good prognosis because they are usually low grade, estrogen receptor (ER)–positive, and human epidermal growth factor receptor two (HER2)–negative.[14] However, ILC tends to have a higher risk of distant recurrence after 10 years when compared with ductal breast cancer.[13] ILC also tends to metastasize to unusual sites, like the gastrointestinal tract and the meninges.[15] Guidelines for ILC treatment in CDH1 carriers do not differ from treatment guidelines for those with sporadic ILCs.[16]

### References

Pharoah PD, Guilford P, Caldas C, et al.: Incidence of gastric cancer and breast cancer in CDH1 (E-cadherin) mutation carriers from hereditary diffuse gastric cancer families. Gastroenterology 121 (6): 1348-53, 2001.11729114
Roberts ME, Ranola JMO, Marshall ML, et al.: Comparison of CDH1 Penetrance Estimates in Clinically Ascertained Families vs Families Ascertained for Multiple Gastric Cancers. JAMA Oncol 5 (9): 1325-1331, 2019.31246251
Xicola RM, Li S, Rodriguez N, et al.: Clinical features and cancer risk in families with pathogenic CDH1 variants irrespective of clinical criteria. J Med Genet 56 (12): 838-843, 2019.31296550
Hansford S, Kaurah P, Li-Chang H, et al.: Hereditary Diffuse Gastric Cancer Syndrome: CDH1 Mutations and Beyond. JAMA Oncol 1 (1): 23-32, 2015.26182300
Delgado E, León-Ponte M, Villahermosa ML, et al.: Analysis of HIV type 1 protease and reverse transcriptase sequences from Venezuela for drug resistance-associated mutations and subtype classification: a UNAIDS study. AIDS Res Hum Retroviruses 17 (8): 753-8, 2001.11429115
Caldas C, Carneiro F, Lynch HT, et al.: Familial gastric cancer: overview and guidelines for management. J Med Genet 36 (12): 873-80, 1999.10593993
Li CI, Anderson BO, Daling JR, et al.: Trends in incidence rates of invasive lobular and ductal breast carcinoma. JAMA 289 (11): 1421-4, 2003.12636465
Corso G, Intra M, Trentin C, et al.: CDH1 germline mutations and hereditary lobular breast cancer. Fam Cancer 15 (2): 215-9, 2016.26759166
Corso G, Figueiredo J, La Vecchia C, et al.: Hereditary lobular breast cancer with an emphasis on E-cadherin genetic defect. J Med Genet 55 (7): 431-441, 2018.29929997
Masciari S, Larsson N, Senz J, et al.: Germline E-cadherin mutations in familial lobular breast cancer. J Med Genet 44 (11): 726-31, 2007.17660459
Kaurah P, MacMillan A, Boyd N, et al.: Founder and recurrent CDH1 mutations in families with hereditary diffuse gastric cancer. JAMA 297 (21): 2360-72, 2007.17545690
Mouabbi JA, Hassan A, Lim B, et al.: Invasive lobular carcinoma: an understudied emergent subtype of breast cancer. Breast Cancer Res Treat 193 (2): 253-264, 2022.35347549
Pilonis ND, Tischkowitz M, Fitzgerald RC, et al.: Hereditary Diffuse Gastric Cancer: Approaches to Screening, Surveillance, and Treatment. Annu Rev Med 72: 263-280, 2021.33217247
Rakha EA, El-Sayed ME, Powe DG, et al.: Invasive lobular carcinoma of the breast: response to hormonal therapy and outcomes. Eur J Cancer 44 (1): 73-83, 2008.18035533
Lamovec J, Bracko M: Metastatic pattern of infiltrating lobular carcinoma of the breast: an autopsy study. J Surg Oncol 48 (1): 28-33, 1991.1653879
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Breast Cancer. Version 4.2023. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2023. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/breast.pdf) Last accessed October 25, 2024.

## Management

### Surgical Intervention: Risk-Reducing Gastrectomy

Risk-reducing total gastrectomy (RRTG) with esophagojejunostomy remains the treatment of choice for individuals with CDH1 pathogenic variants.[1] The RRTG specimens from individuals with CDH1 pathogenic variants often consist of microscopic foci of intramucosal signet ring cell carcinoma (SRCC), usually confined to the superficial lamina propria, without infiltration beneath the muscularis.[2-6] Intramucosal signet ring cells in the lamina propria may be classified as invasive, but they follow an indolent course. Microscopic foci of SRCC may never grow into advanced diffuse gastric cancer because early-stage CDH1-associated lesions are typically transient, with an indolent immunoexpression phenotype.[7] A systematic review of 224 reported RRTGs (performed in individuals with CDH1 pathogenic variants) found gastric cancer in 85.4% of specimens.[8] Of the 224 specimens, histopathology findings were available for 219. In 32 (14.6%) cases, cancer was not detected. In 159 (72.6%) cases, at least one focus of SRCC was identified. In 28 (12.8%) cases, an invasive tumor was identified. Overall, 33% of individuals without family histories of gastric cancer had cancer detected in their gastrectomy specimens, while 85% of patients with family histories of gastric cancer had cancer detected in their gastrectomy specimens. A retrospective review of 101 RRTG specimens (from asymptomatic patients with CDH1 pathogenic variants) identified early-stage pT1a SRCC in 85% of patients.[2] Younger (aged <18 y) or older (aged >70 y) individuals require a more individualized approach, given the high morbidity rates associated with this surgery. Gastrectomy can be performed robotically, laparoscopically, or in a traditional, open fashion.[9] Care must always be taken to ensure that surgical margins are free of gastric epithelium.

Functional outcomes after RRTG vary, but weight loss is universal. One series reported an average weight loss of 15% to 20% postsurgery.[2-4] Most patients eventually establish a new normal after surgery, but their nutritional statuses must be closely monitored. Other risks after gastrectomy include the following: nutritional deficiencies, anastomotic leaks, intra-abdominal infections, gastrointestinal symptoms like diarrhea and reflux, and a mortality rate that ranges from 3% to 6%.[10] A review of 54 patients who had a RRTG (median age, 41 y) showed that median quality of life was very good after 4.6 years of follow-up.[4]

An international group of experts have published consensus guidelines for follow-up of patients with hereditary diffuse gastric cancer (HDGC) after RRTG.[11] They recommend regular follow-up with a multidisciplinary team who will review the patient's diet, weight, and symptoms. Laboratory tests are also recommended to document general health, nutrition, bone health, and cancer risk (i.e., breast cancer). The guidelines state that vitamin and mineral supplementation are to be considered. Although most of the statements in the guidelines were supported by low levels of evidence, they provide a framework for management of patients with HDGC after RRTG.

### Endoscopic Surveillance

RRTG is generally considered the treatment of choice for patients with HDGC since it minimizes gastric cancer risk by removing high-risk gastric tissue (given the lack of consistently identifiable precursor lesions on endoscopy).[1] When gastrectomy is not performed, endoscopic surveillance is an alternate option. When gastrectomy is performed, multiple microscopic foci of SRCC are typically found. In contrast, targeted, random sampling of the stomach during endoscopy often fails to identify microscopic foci of SRCC. Since diffuse gastric cancer often results in a grim prognosis and is usually found at an advanced stage, most experts recommend total gastrectomy, regardless of the number of signet ring cell lesions found during endoscopic sampling. In one series, six patients with CDH1 pathogenic variants from one family (mean age, 54 y) underwent RRTG despite an absence of symptoms and normal esophagogastroduodenoscopies (EGDs) with negative random biopsies of the stomach. Microscopic foci of SRCC were present in all individuals who underwent RRTG.[12] Researchers performed surveillance EGDs on 20 CDH1 carriers.[13] Suspicious lesions were not found in any participants during EGD examinations. However, SSRC was found in 40% of endoscopic biopsy samples. Thirty or more random endoscopic biopsies were performed in each participant.

Although RRTG remains the gold standard recommendation for HDGC, a multidisciplinary discussion on management options is favored based on the following: emerging evidence on endoscopic surveillance, the unpredictable rate of progression from intramucosal signet cells and T1a lesions to advanced gastric cancer, and morbidity of surgery. There is a role for endoscopic surveillance in HDGC, specifically for patients who decline surgery or choose to defer RRTG when they are diagnosed with HDGC. A prospective cohort study analyzed 270 asymptomatic CDH1 carriers (median age, 46.6 y; interquartile range [IQR], 36.5–59.8) who declined RRTG and participated in endoscopic surveillance with the Cambridge protocol (9%) or Bethesda protocol (91%).[5] These individuals underwent surveillance for a median period of 31.1 months (IQR, 17.1–42.1) at recommended 6-month to 12-month intervals. Surveillance identified SSRC in 63% (76/120) of patients. Ninety-seven percent (74/76) of patients with visibly normal mucosa had malignancies detected on random biopsies. In 93% of patients who had RRTG, multifocal stage IA gastric carcinoma was detected, with no stage III or IV cancers detected. The authors concluded that endoscopic surveillance is an acceptable surveillance strategy in those who decline RRTG.

Other scenarios that may prompt endoscopic surveillance include the following:[1]

1. Patients with family histories suggestive of HDGC but for whom no pathogenic variant has been identified.
2. Patients with family histories of intestinal-type gastric cancer. This type of gastric cancer is usually not associated with CDH1 pathogenic variants. Therefore, endoscopic surveillance needs to be individualized for these patients.
3. Patients who have a CDH1 pathogenic variant and choose to defer RRTG for a year or more. This includes patients who undergo genetic testing at a young age and test positive for a CDH1 pathogenic variant. Risk-reducing gastrectomy is generally not recommended in individuals who are younger than 18 to 20 years. Despite being warned about endoscopic biopsy's poor rate of HDGC precursor detection, many patients (especially those who are older) will only consider gastrectomy in the event of a positive biopsy.

There are no definitive, identifiable features of early diffuse gastric cancer or diffuse gastric cancer precursors that can be found on endoscopy. Targeted biopsies of ulcers, erythema, nodularity/nodules, polyps, erosions, and scars revealed SSRC in less than 10% of samples.[5] Pale spots had the highest rate of SSRC detected. Hence, a liberal number of random biopsies are taken from the gastric mucosa during endoscopy since the epithelium that covers SSRC generally appears normal.[5,14] Random biopsies enhanced detection of SSRC more than targeted biopsies did. Reports suggested that individuals with HDGC can have many microscopic tumors in the body-antrum transitional zone.[6] However, a more recent study suggested that these tumors typically involve the oxyntic mucosa and the proximal stomach instead.[15]

Figure 3. Several small, white, slightly depressed areas are best seen with narrow-band imaging. These lesions can resemble scars from previous endoscopic biopsies. However, the images above are from a patient who did not have a prior esophagogastroduodenoscopy. A microscopic signet ring cell carcinoma focus was found on this biopsy, although nontargeted biopsies in this patient were also positive for signet ring cell carcinoma.

Three endoscopic images of the inside of the stomach showing several small, white, slightly depressed, scar-like lesions.

Another study reported on 33 patients with CDH1 pathogenic variants (median age, 32 y) who were members of the original Māori family in which HDGC was first discovered. Participants underwent 99 surveillance endoscopies, 93 of which were performed with a mucolytic N-acetylcysteine followed by Congo red–methylene blue dye.[16] Twenty-four of 93 endoscopies exhibited one or more flat, pale patches, which were between 2 mm and 10 mm in diameter. SRCC was found in 23 of the 56 patches that were biopsied (41%). The authors concluded that these patches could be better characterized with Congo red–methylene blue chromogenic dyes. Biopsy yields increased when these dyes were used. The authors did, however, express concern that Congo red dye may have carcinogenic properties, and its use has not persisted.

If an endoscopic approach is taken for HDGC management, endoscopic surveillance is recommended annually unless signet ring cell features are found. If signet ring cell lesions are found on endoscopy, discussion with a multidisciplinary team is warranted.[1] However, diffuse gastric cancer risk remains unclear in individuals with foci of signet ring cells found on endoscopy, since the natural course of these foci are unknown.

### Breast Cancer Risk Management

In females with a CDH1 pathogenic variant, screening modalities for breast cancer include the following:

Breast magnetic resonance imaging (MRI):

- The National Comprehensive Cancer Network (NCCN) recommends consideration of breast MRI with contrast beginning at age 30 years.[17]
- The International Gastric Cancer Linkage Consortium (IGCLC) recommends that annual breast MRI begin at age 30 years since mammography is not effective at identifying lobular breast cancer.[1,18]

Mammography:

- NCCN and IGCLC have differing recommendations regarding the age to begin mammography screening.
- NCCN recommends that annual mammography screenings begin at age 30 years.[17]
- IGCLC recommends that annual mammography screenings begin between the ages of 35 and 40 years, based on the patient’s breast cancer risk factors, like breast density.[1]

Other imaging:

- The IGCLC states that supplementary screening of dense breasts with ultrasound can be considered, especially when MRI is not available, contraindicated, or declined.[1]

Bilateral risk-reducing mastectomy can be considered for women with a CDH1 pathogenic variant based on a strong family history of breast cancer, additional breast cancer risk factors, and/or personal choice.[1,17]

### References

Blair VR, McLeod M, Carneiro F, et al.: Hereditary diffuse gastric cancer: updated clinical practice guidelines. Lancet Oncol 21 (8): e386-e397, 2020.32758476
Vos EL, Salo-Mullen EE, Tang LH, et al.: Indications for Total Gastrectomy in CDH1 Mutation Carriers and Outcomes of Risk-Reducing Minimally Invasive and Open Gastrectomies. JAMA Surg 155 (11): 1050-1057, 2020.32997132
Strong VE, Gholami S, Shah MA, et al.: Total Gastrectomy for Hereditary Diffuse Gastric Cancer at a Single Center: Postsurgical Outcomes in 41 Patients. Ann Surg 266 (6): 1006-1012, 2017.27759617
Stillman MD, Kusche N, Toledano S, et al.: Short and long-term outcomes of prophylactic total gastrectomy in 54 consecutive individuals with germline pathogenic mutations in the CDH1 gene. J Surg Oncol 126 (8): 1413-1422, 2022.36063148
Asif B, Sarvestani AL, Gamble LA, et al.: Cancer surveillance as an alternative to prophylactic total gastrectomy in hereditary diffuse gastric cancer: a prospective cohort study. Lancet Oncol 24 (4): 383-391, 2023.36990610
Charlton A, Blair V, Shaw D, et al.: Hereditary diffuse gastric cancer: predominance of multiple foci of signet ring cell carcinoma in distal stomach and transitional zone. Gut 53 (6): 814-20, 2004.15138207
van der Post RS, Gullo I, Oliveira C, et al.: Histopathological, Molecular, and Genetic Profile of Hereditary Diffuse Gastric Cancer: Current Knowledge and Challenges for the Future. Adv Exp Med Biol 908: 371-91, 2016.27573781
Corso G, Magnoni F, Nicastro V, et al.: Global distribution of prophylactic total gastrectomy in E-cadherin (CDH1) mutations. Semin Oncol 49 (2): 130-135, 2022.35393124
Bres C, Voron T, Benhaim L, et al.: Management of Pathogenic CDH1 Variant Carriers Within the FREGAT Network: A Multicentric Retrospective Study. Ann Surg 276 (5): 830-837, 2022.35856494
Davis JL, Ripley RT: Postgastrectomy Syndromes and Nutritional Considerations Following Gastric Surgery. Surg Clin North Am 97 (2): 277-293, 2017.28325187
Roberts G, Benusiglio PR, Bisseling T, et al.: International Delphi consensus guidelines for follow-up after prophylactic total gastrectomy: the Life after Prophylactic Total Gastrectomy (LAP-TG) study. Gastric Cancer 25 (6): 1094-1104, 2022.35831514
Norton JA, Ham CM, Van Dam J, et al.: CDH1 truncating mutations in the E-cadherin gene: an indication for total gastrectomy to treat hereditary diffuse gastric cancer. Ann Surg 245 (6): 873-9, 2007.17522512
Jacobs MF, Dust H, Koeppe E, et al.: Outcomes of Endoscopic Surveillance in Individuals With Genetic Predisposition to Hereditary Diffuse Gastric Cancer. Gastroenterology 157 (1): 87-96, 2019.30935944
Lee CYC, Olivier A, Honing J, et al.: Endoscopic surveillance with systematic random biopsy for the early diagnosis of hereditary diffuse gastric cancer: a prospective 16-year longitudinal cohort study. Lancet Oncol 24 (1): 107-116, 2023.36509094
Fujita H, Lennerz JK, Chung DC, et al.: Endoscopic surveillance of patients with hereditary diffuse gastric cancer: biopsy recommendations after topographic distribution of cancer foci in a series of 10 CDH1-mutated gastrectomies. Am J Surg Pathol 36 (11): 1709-17, 2012.23073328
Shaw D, Blair V, Framp A, et al.: Chromoendoscopic surveillance in hereditary diffuse gastric cancer: an alternative to prophylactic gastrectomy? Gut 54 (4): 461-8, 2005.15753528
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Breast, Ovarian, and Pancreatic. Version 2.2024. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2023. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_bop.pdf) Last accessed September 18, 2024.
Pereslucha AM, Wenger DM, Morris MF, et al.: Invasive Lobular Carcinoma: A Review of Imaging Modalities with Special Focus on Pathology Concordance. Healthcare (Basel) 11 (5): , 2023.36900751

## Latest Updates to This Summary (10/25/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Introduction

Added text to state that in patients with CDH1 pathogenic variants, early stage gastric cancer is characterized by intramucosal foci of signet ring cell carcinoma while advanced gastric cancer presents as poorly cohesive diffuse type carcinoma with very few typical signet ring cells (cited van der Post et al. as reference 1).

Revised text to state that the first study to provide CTNNA1 penetrance estimates reported up to a 57% lifetime risk of developing gastric cancer in families from European hereditary cancer registries (cited Coudert et al. as reference 12).

Genetic Testing Criteria for Hereditary Diffuse Gastric Cancer

Revised text to state that when two or more different cancer types are involved, at least one must be diffuse gastric cancer with signet ring cell carcinoma or lobular breast cancer.

Definition and Management of Hereditary Diffuse Gastric Cancer (HDGC)–Like Families

Revised text to state that the 2020 International Gastric Cancer Linkage Consortium defines families as HDGC-like if the following criteria are met: 1) a CDH1 or CTNNA1 pathogenic variant is not found, 2) there is at least one confirmed case of diffuse gastric cancer in the family, and 3) another gastric cancer or lobular breast cancer is found in first-degree or second-degree relatives.

Genetics

The Molecular Biology subsection was extensively revised.

Management

The Surgical Intervention: Risk-Reducing Gastrectomy subsection was extensively revised.

The Endoscopic Surveillance subsection was extensively revised.

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of hereditary diffuse gastric cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Hereditary Diffuse Gastric Cancer are:

- Doreen Agnese, MD (The Ohio State University)
- Ilana Cass, MD (Dartmouth-Hitchcock Medical Center)
- Lee-may Chen, MD (UCSF Helen Diller Family Comprehensive Cancer Center)
- Mary B. Daly, MD, PhD (Fox Chase Cancer Center)
- Grace-Ann O. Fasaye, ScM, CGC (National Cancer Institute)
- Gautam Mankaney, MD (Virginia Mason Franciscan Health)
- Tuya Pal, MD, FACMG, FCCMG (Vanderbilt-Ingram Cancer Center)
- Padma Sheila Rajagopal, MD, MPH, MSC (National Cancer Institute)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ Hereditary Diffuse Gastric Cancer. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/information-summaries/genetics/hereditary-diffuse-gastric-cancer-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 37669414]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).